# Malignant Mesothelioma Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of adult malignant mesothelioma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Malignant Mesothelioma

Key Points for This Section
- Malignant mesothelioma is a type of cancer that forms in the thin layer of tissue that covers organs in the chest or abdomen.
- Being exposed to asbestos can increase the risk of malignant mesothelioma.
- Signs and symptoms of malignant mesothelioma include shortness of breath and pain under the rib cage.
- Tests that examine the inside of the chest and abdomen are used to diagnose malignant mesothelioma.
- After malignant mesothelioma has been diagnosed, tests are done to find out if cancer cells have spread to other parts of the body.
- Some people decide to get a second opinion.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Malignant mesothelioma is a type of cancer that forms in the thin layer of tissue that covers organs in the chest or abdomen.

Malignant mesothelioma may be found in one or more of the following:

- the pleura, a thin layer of tissue that lines the chest cavity and covers the lungs
- the peritoneum, a thin layer of tissue that lines the abdomen and covers most of the organs in the abdomen
- the pericardium, a thin layer of tissue that surrounds the heart

Malignant mesothelioma may also form in the heart or testicles, but this is rare.

Malignant mesothelioma forms in the tissue that lines the chest or abdomen, including the pleura (the tissue that lines the chest cavity and covers the lungs) and the peritoneum (the tissue that lines the abdomen and covers most of the organs in the abdomen). Malignant mesothelioma may also form in the pericardium (the tissue that surrounds the heart) or the testicles, but this is rare.

Drawing shows parts of the body where malignant mesothelioma may form, including the pleura (the tissue that lines the chest cavity and covers the lungs), the pericardium (the tissue that surrounds the heart), the peritoneum (the tissue that lines the abdomen and covers most of the organs in the abdomen), and the testicles. The heart and lungs are also shown.

### Being exposed to asbestos can increase the risk of malignant mesothelioma.

Malignant mesothelioma is caused by certain changes to the way the cells that line the organs function, especially how they grow and divide into new cells. Often, the exact cause of the cell change is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Most people with malignant mesothelioma have worked or lived in places where they inhaled or swallowed asbestos, which has been used in the building and textile industries. After being exposed to asbestos, it usually takes a long time for malignant mesothelioma to form. Living with a person who works near asbestos is also a risk factor for malignant mesothelioma. Not every person with one or more of these risk factors will develop malignant mesothelioma. And it can develop in some people who don't have any known risk factors.

Talk to your doctor if you think you may be at risk.

### Signs and symptoms of malignant mesothelioma include shortness of breath and pain under the rib cage.

Sometimes the cancer causes fluid to collect in the chest or in the abdomen. Signs and symptoms may be caused by the fluid, malignant mesothelioma, or other conditions. Check with your doctor if you have any of the following:

- trouble breathing
- cough
- pain under the rib cage
- pain or swelling in the abdomen
- lumps in the abdomen
- constipation
- problems with blood clots (clots form when they shouldn't)
- weight loss for no known reason
- fatigue (feeling very tired)

### Tests that examine the inside of the chest and abdomen are used to diagnose malignant mesothelioma.

Sometimes it is hard to tell the difference between malignant mesothelioma in the chest and lung cancer. If you have symptoms that suggest mesothelioma, the doctor will need to find out if these are due to cancer or to another problem. The doctor will ask when the symptoms started and how often you have been having them. They will also ask about your personal and family health history and do a physical exam. Depending on these results, they may recommend other tests. If you are diagnosed with mesothelioma, the results of these tests will help you and your doctor plan treatment.

The tests and procedures used to diagnose mesothelioma may include:

- Chest x-ray is a type of radiation that can go through the body and make pictures of the organs and bones inside the chest.
  A chest x-ray is used to take pictures of the structures and organs inside the chest. X-rays pass through the patient's body onto film or a computer.
  Chest x-ray; drawing shows a patient standing with their back to the x-ray machine. X-rays pass through the patient's body onto film or a computer and take pictures of the structures and organs inside the chest.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more at Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
- Biopsy is the removal of cells or tissues from the pleura or peritoneum so that a pathologist can view it under a microscope to check for signs of cancer.
  Procedures used to collect the cells or tissues include:
  - Fine-needle (FNA) aspiration biopsy of the lung uses a thin needle to remove tissue or fluid. An imaging procedure is used to locate the abnormal tissue or fluid in the lung. A small incision may be made in the skin where the biopsy needle is inserted into the abnormal tissue or fluid, and a sample is removed.
    Fine-needle aspiration biopsy of the lung. The patient lies on a table that slides through the computed tomography (CT) machine, which takes x-ray pictures of the inside of the body. The x-ray pictures help the doctor see where the abnormal tissue is in the lung. A biopsy needle is inserted through the chest wall and into the area of abnormal lung tissue. A small piece of tissue is removed through the needle and checked under the microscope for signs of cancer.
    Fine-needle aspiration biopsy of the lung; drawing shows a patient lying on a table that slides through the computed tomography (CT) machine with an x-ray picture of a cross-section of the lung on a monitor above the patient. Drawing also shows a doctor using the x-ray picture to help place the biopsy needle through the chest wall and into the area of abnormal lung tissue. Inset shows a side view of the chest cavity and lungs with the biopsy needle inserted into the area of abnormal tissue.
  - Thoracoscopy is surgery to look at the organs inside the chest to check for abnormal areas. An incision (cut) is made between two ribs and a thoracoscope (a thin, tube-like instrument with a light and a lens for viewing) is inserted into the chest.
  - Thoracotomy is surgery to look inside the chest. An incision (cut) is made between two ribs to check inside the chest for signs of disease.
  - Peritoneoscopy is surgery to look inside the abdomen. An incision (cut) is made in the abdominal wall and a peritoneoscope (a thin, tube-like instrument with a light and a lens for viewing) is inserted into the abdomen to check for signs of disease.
  - Open biopsy is surgery to remove abnormal tissues so a pathologist can check it under a microscope for signs of disease. An incision (cut) is made through the skin to expose and remove tissues.
  The following tests may be done on the cells and tissue samples that are taken:
  - A cytologic exam is a laboratory test to view cells under a microscope to check for anything abnormal. For mesothelioma, fluid is taken from the chest or from the abdomen. A pathologist checks the fluid for signs of cancer.
  - Immunohistochemistry is a laboratory test that uses antibodies to check for certain antigens (markers) in a sample of a patient's tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type of cancer.
  - Electron microscopy is a laboratory test in which cells in a sample of tissue are viewed under a high-powered microscope to look for certain changes in the cells. An electron microscope shows tiny details better than other types of microscopes.

### After malignant mesothelioma has been diagnosed, tests are done to find out if cancer cells have spread to other parts of the body.

The process used to find out if cancer has spread outside the pleura or peritoneum is called staging. The information gathered from the staging process determines the stage of the disease. It is important to know whether the cancer has spread in order to plan treatment.

The following tests and procedures may be used in the staging process:

- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the chest and abdomen. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more at Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
- PET scan (positron emission tomography scan) uses a small amount of radioactive sugar that is injected into a vein. The PET scanner rotates around the body to make detailed, computerized pictures of areas inside the body where the glucose is taken up. Because cancer cells often take up more glucose than normal cells, the pictures can be used to find cancer cells in the body.
- MRI (magnetic resonance imaging) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Endoscopic ultrasound (EUS) is a procedure in which an endoscope is inserted into the body. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. A probe at the end of the endoscope is used to bounce high-energy sound waves (ultrasound) off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. This procedure is also called endosonography. EUS may be used to guide fine-needle aspiration (FNA) biopsy of the lung, lymph nodes, or other areas.
  Endoscopic ultrasound-guided fine-needle aspiration biopsy. An endoscope that has an ultrasound probe and a biopsy needle is inserted through the mouth and into the esophagus. The probe bounces sound waves off body tissues to make echoes that form a sonogram (computer picture) of the lymph nodes near the esophagus. The sonogram helps the doctor see where to place the biopsy needle to remove tissue from the lymph nodes. This tissue is checked under a microscope for signs of cancer.
  Endoscopic ultrasound-guided fine-needle aspiration biopsy; drawing shows an endoscope with an ultrasound probe and biopsy needle inserted through the mouth and into the esophagus. Also shown are the lymph nodes near the esophagus and cancer in one lung. An inset shows the ultrasound probe locating the lymph nodes with cancer and the biopsy needle removing tissue from one of the lymph nodes near the esophagus.
- Laparoscopy is surgery to look at the organs inside the abdomen to check for signs of disease. Small incisions (cuts) are made in the wall of the abdomen and a laparoscope (a thin, lighted tube) is inserted into one of the incisions. Other instruments may be inserted through the same or other incisions to perform procedures such as taking tissue samples to be checked under a microscope for signs of disease.
- Lymph node biopsy is the removal of all or part of a lymph node. A pathologist views the lymph node tissue under a microscope to check for cancer cells.
- Mediastinoscopy is surgery to look at the organs, tissues, and lymph nodes between the lungs for abnormal areas. An incision (cut) is made at the top of the breastbone and a mediastinoscope is inserted into the chest. A mediastinoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue or lymph node samples, which are checked under a microscope for signs of cancer.

### Some people decide to get a second opinion.

You may want to get a second opinion to confirm your cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes or another treatment approach, or provide more information about your cancer.

Learn more about choosing a doctor and getting a second opinion at Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor, hospital, or getting a second opinion. For questions you might want to ask at your appointments, visit Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options depend on:

- the stage of the cancer
- the size of the tumor
- whether the tumor can be removed completely by surgery
- the amount of fluid in the chest or abdomen
- the patient's age
- the patient's activity level
- the patient's general health, including lung and heart health
- the type of mesothelioma cells and how they look under a microscope
- the number of white blood cells and how much hemoglobin is in the blood
- whether the patient is male or female
- whether the cancer has just been diagnosed or has recurred (come back)

## Stages of Malignant Mesothelioma

Key Points for This Section
- Cancer stage describes the extent of cancer in the body.
- The following stages are used for malignant mesothelioma of the lung:
  - Stage I (also called stage 1) malignant mesothelioma
  - Stage II (also called stage 2) malignant mesothelioma
  - Stage III (also called stage 3) malignant mesothelioma
  - Stage IV (also called stage 4) malignant mesothelioma
- Malignant mesothelioma can recur (come back) after it has been treated.

### Cancer stage describes the extent of cancer in the body.

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. It is important to know the stage of mesothelioma to plan the best treatment.

There are several staging systems for cancer that describe the extent of the cancer. Malignant mesothelioma staging usually uses the TNM staging system. The cancer may be described by this staging system in your pathology report. Based on the TNM results, a stage (I, II, III, or IV, also written as 1, 2, 3, or 4) is assigned to your cancer. When talking to you about your diagnosis, your doctor may describe the cancer as one of these stages.

Learn about tests to stage mesothelioma. Learn more about Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

### The following stages are used for malignant mesothelioma of the lung:

#### Stage I (also called stage 1) malignant mesothelioma

Stage I is divided into stages IA and IB:

- In stage IA, cancer is found in the inside lining of the chest wall on one side of the chest. On the same side of the chest, cancer may also be found in one or more of the following:
  - the thin layer of tissue that covers the lung
  - the thin layer of tissue that covers the organs between the lungs
  - the thin layer of tissue that covers the top of the diaphragm
- In stage IB, cancer is found in the inside lining of the chest wall, and in each of the thin layers of tissue that cover the lung, the organs between the lungs, and the top of the diaphragm on one side of the chest. On the same side of the chest, cancer has also spread into one or more of the following:
  - diaphragm
  - lung tissue
  - tissue between the ribs and the inside lining of the chest wall
  - fat in the area between the lungs
  - soft tissues of the chest wall
  - sac around the heart

#### Stage II (also called stage 2) malignant mesothelioma

In stage II, cancer is found in the inside lining of the chest wall on one side of the chest. On the same side of the chest, cancer may also be found in one or more of the following:

- the thin layer of tissue that covers the lung
- the thin layer of tissue that covers the organs between the lungs
- the thin layer of tissue that covers the top of the diaphragm

Cancer has spread to lymph nodes along the center of the chest on the same side of the chest as the tumor.

or

Cancer is found in the inside lining of the chest wall, and in each of the thin layers of tissue that cover the lung, the organs between the lungs, and the top of the diaphragm on one side of the chest. On the same side of the chest, cancer has also spread into one or both of the following:

- diaphragm
- lung tissue

Cancer has spread to lymph nodes along the center of the chest on the same side of the chest as the tumor.

#### Stage III (also called stage 3) malignant mesothelioma

Stage III is divided into stages IIIA and IIIB.

- In stage IIIA, cancer is found in the inside lining of the chest wall, and in each of the thin layers of tissue that cover the lung, the organs between the lungs, and the top of the diaphragm on one side of the chest. On the same side of the chest, cancer has also spread into one or more of the following:
  - tissue between the ribs and the inside lining of the chest wall
  - fat in the area between the lungs
  - soft tissues of the chest wall
  - sac around the heart
  Cancer has spread to lymph nodes along the center of the chest on the same side of the chest as the tumor.
- In stage IIIB, cancer is found in the inside lining of the chest wall, and may also be found in the thin layers of tissue that cover the lung, the organs between the lungs, and/or the top of the diaphragm on one side of the chest. On the same side of the chest, cancer may have also spread into one or more of the following:
  - diaphragm
  - lung tissue
  - tissue between the ribs and the inside lining of the chest wall
  - fat in the area between the lungs
  - soft tissues of the chest wall
  - sac around the heart
  Cancer has spread to lymph nodes above the collarbone on either side of the chest or cancer has spread to lymph nodes along the center of the chest on the opposite side of the chest as the tumor.
  or
  Cancer is found in the inside lining of the chest wall, and in each of the thin layers of tissue that cover the lung, the organs between the lungs, and the top of the diaphragm on one side of the chest. Cancer has also spread to one or more of the following:
  - the chest wall and may be found in the rib
  - through the diaphragm into the peritoneum
  - the tissue lining the chest on the opposite side of the body as the tumor
  - the organs in the area between the lungs (esophagus, trachea, thymus, blood vessels)
  - the spine
  - through the sac around the heart or into the heart muscle
  Cancer may have spread to lymph nodes.

#### Stage IV (also called stage 4) malignant mesothelioma

In stage IV, cancer has spread to the tissue covering the lung or the lung on the opposite side of the chest, peritoneum, bones, liver, lymph nodes outside the chest, or to other parts of the body.

Stage IV malignant mesothelioma is also called metastatic mesothelioma. Metastatic cancer happens when cancer cells travel through the lymphatic system or blood and form tumors in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor. For example, if malignant mesothelioma spreads to the liver, the cancer cells in the liver are actually malignant mesothelioma cells. The disease is called metastatic mesothelioma, not liver cancer. Learn more in Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

### Malignant mesothelioma can recur (come back) after it has been treated.

Recurrent malignant mesothelioma is cancer that has come back after it has been treated. If mesothelioma comes back, it may come back in the chest or in other parts of the body, such as the liver, lungs, or both. Tests will be done to help determine where the cancer has returned. The type of treatment for recurrent mesothelioma will depend on where it has come back.

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer). Information to help you cope and talk with your health care team can be found in the booklet When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for patients with malignant mesothelioma.
- The following types of treatment are used:
  - Surgery
  - Radiation therapy
  - Chemotherapy
  - Immunotherapy
  - Targeted therapy
- New types of treatment are being tested in clinical trials.
- Treatment for malignant mesothelioma may cause side effects.
- Follow-up care may be needed.

### There are different types of treatment for patients with malignant mesothelioma.

Different types of treatments are available for malignant mesothelioma. You and your cancer care team will work together to decide your treatment plan, which may include more than one type of treatment. Many factors will be considered, such as the stage of the cancer, your overall health, and your preferences. Your plan will include information about your cancer, the goals of treatment, your treatment options and the possible side effects, and the expected length of treatment.

Talking with your cancer care team before treatment begins about what to expect will be helpful. You’ll want to learn what you need to do before treatment begins, how you’ll feel while going through it, and what kind of help you will need. To learn more, visit Questions to Ask Your Doctor About Treatment (https://www.cancer.gov/about-cancer/treatment/questions).

### The following types of treatment are used:

#### Surgery

The following surgical treatments may be used for malignant mesothelioma in the chest:

- Wide local excision is surgery to remove the cancer and some of the healthy tissue around it. The amount of healthy tissue removed depends on how deep or how large the tumor being removed is.
- Pleurectomy and decortication is surgery to remove part of the covering of the lungs and lining of the chest and part of the outside surface of the lungs.
- Extrapleural pneumonectomy is surgery to remove one whole lung and part of the lining of the chest, the diaphragm, and the lining of the sac around the heart.
- Pleurodesis is surgery that uses chemicals or drugs to make a scar in the space between the layers of the pleura. Fluid is first drained from the space using a catheter or chest tube and the chemical or drug is put into the space. The scarring stops the build-up of fluid in the pleural cavity.

After the doctor removes all the cancer that can be seen at the time of the surgery, some people may receive chemotherapy or radiation therapy to kill any cancer cells that are left. Treatment given after the surgery, to lower the risk that the cancer will come back, is called adjuvant therapy.

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. It may also be used as palliative care to relieve symptoms and improve quality of life.

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. Combination chemotherapy is the use of more than one anticancer drug.

Systemic chemotherapy is when chemotherapy is taken by mouth or injected into a vein or muscle. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body.

Regional chemotherapy is when chemotherapy is placed directly into an organ or a body cavity, such as the chest or peritoneum. When given this way, the drugs mainly affect cancer cells in those areas. Hyperthermic intraperitoneal chemotherapy (HIPEC) is a type of regional chemotherapy used to treat malignant mesothelioma:

- HIPEC may be used to treat mesothelioma that has spread to the peritoneum (tissue that lines the abdomen and covers most of the organs in the abdomen). After the surgeon removes all the cancer that can be seen, a solution containing anticancer drugs is heated and pumped into and out of the abdomen to kill cancer cells that remain. Heating the anticancer drugs may kill more cancer cells.

The way the chemotherapy is given depends on the type and stage of the cancer being treated.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy) and Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you).

Visit Drugs Approved for Malignant Mesothelioma (https://www.cancer.gov/about-cancer/treatment/drugs/mesothelioma) for more information.

#### Immunotherapy

Immunotherapy helps a person's immune system fight cancer. Your doctor may suggest biomarker tests to help predict your response to certain immunotherapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Immunotherapy drugs used to treat advanced mesothelioma include:

- ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab)
- nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab)

Other immunotherapy drugs, such as durvalumab (https://www.cancer.gov/about-cancer/treatment/drugs/durvalumab), are being studied in malignant mesothelioma.

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

#### Targeted therapy

Targeted therapy uses drugs or other substances to identify and attack specific cancer cells. Bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab) is a targeted therapy drug used to treat malignant mesothelioma.

Other targeted therapies, such as ramucirumab (https://www.cancer.gov/about-cancer/treatment/drugs/ramucirumab), are being studied in malignant mesothelioma.

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### New types of treatment are being tested in clinical trials.

Joining a clinical trial may be an option. There are different types of clinical trials for people with mesothelioma. For example, a treatment trial tests new treatments or new ways of using existing treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting participants. This search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for malignant mesothelioma may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

### Follow-up care may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

## Treatment of Localized Malignant Mesothelioma (Stage I)

If stage I malignant mesothelioma is in one part of the chest lining, treatment may include surgery to remove the cancer and the tissue around it.

Treatment of stage I intracavitary mesothelioma may include:

- a surgery called extrapleural pneumonectomy
- palliative surgery with pleurectomy and decortication, which may be followed by radiation therapy, to relieve symptoms and improve quality of life
- palliative radiation therapy to relieve symptoms and improve quality of life

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Advanced Malignant Mesothelioma (Stages II, III, and IV)

If stage II, stage III, or stage IV malignant mesothelioma is found in the chest, treatment may include:

- immunotherapy (nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab) and ipilimumab (https://www.cancer.gov/about-cancer/treatment/drugs/ipilimumab))
- combination chemotherapy with or without targeted therapy (bevacizumab (https://www.cancer.gov/about-cancer/treatment/drugs/bevacizumab))
- combination chemotherapy and palliative care, which may be followed by maintenance chemotherapy
- palliative care, which may include draining fluid from the chest, a procedure to prevent fluid from collecting in the chest (pleurodesis), surgery, or radiation therapy, to relieve symptoms and improve quality of life
- chemotherapy placed directly into the chest or abdominal cavity to shrink the tumors and keep fluid from building up

If stage II, stage III, or stage IV malignant mesothelioma is found in the peritoneum, treatment may include:

- surgery to remove the tumor followed by hyperthermic intraperitoneal chemotherapy
- chemotherapy

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Malignant Mesothelioma

When malignant mesothelioma recurs (comes back), the treatment strategy often involves options that weren’t used in the initial treatment. If you haven’t received systemic therapy before, treatment may include:

- chemotherapy
- a combination of chemotherapy and immunotherapy (nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab))
- immunotherapy alone

If you have received systemic therapy, treatment might include the following, given alone or in combination:

- chemotherapy
- immunotherapy

For certain people with locally recurrent cancer, surgery to remove the affected part of the chest wall may be an option.

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Malignant Mesothelioma

For more from the National Cancer Institute about malignant mesothelioma, see the following:

- Malignant Mesothelioma Home Page (https://www.cancer.gov/types/mesothelioma/)
- Drugs Approved for Malignant Mesothelioma (https://www.cancer.gov/about-cancer/treatment/drugs/mesothelioma)
- Asbestos Exposure and Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/risk/substances/asbestos/asbestos-fact-sheet)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of adult malignant mesothelioma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Malignant Mesothelioma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/mesothelioma/patient/mesothelioma-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389166]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).